# Cardiopulmonary Syndromes (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the pathophysiology and treatment of cardiopulmonary syndromes, including dyspnea, malignant pleural effusion, malignant pericardial effusion, and superior vena cava syndrome. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Supportive and Palliative Care Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Overview

Patients with cancer often have comorbid medical problems. Patients older than 65 years bear a disproportionate burden of cancer as well as increased prevalence of medical problems such as chronic obstructive pulmonary disease, heart disease, diabetes, and hypertension.[1] In both primary care and cancer care settings, unexplained symptoms often frustrate physicians and patients.[2] Because many advanced cancers spread to the thorax, symptoms such as dyspnea, cough, chest pain, and palpitations are common. Sorting out the likely cause of these problems and developing appropriate interventions can be difficult. Evidence-based recommendations describing various approaches to cancer-related fatigue, anorexia, depression, and dyspnea have been published.[3] Cancer patients are also often at higher risk of developing pulmonary infections.

Clinicians caring for cancer patients should be familiar with the assessment and treatment of common conditions that manifest as chest symptoms. In addition, these clinicians need to be familiar with some cancer-specific aspects of chest symptoms and syndromes. Dyspnea is a common symptom of certain cancers such as lung cancer and is also common in patients with numerous advanced cancers. Dyspnea is often multifactorial. Optimal treatment requires an understanding of contributing etiologies and pathophysiologies to direct therapeutic interventions as clinically appropriate.

Important cardiopulmonary syndromes include the following:

- Malignant pleural effusion.
- Malignant pericardial effusion.
- Superior vena cava syndrome.
- Lymphangitic carcinomatosis.

In this summary, unless otherwise stated, evidence and practice issues as they relate to adults are discussed. The evidence and application to practice related to children may differ significantly from information related to adults. When specific information about the care of children is available, it is summarized under its own heading.

### References

Yancik R, Ganz PA, Varricchio CG, et al.: Perspectives on comorbidity and cancer in older patients: approaches to expand the knowledge base. J Clin Oncol 19 (4): 1147-51, 2001.11181680
Komaroff AL: Symptoms: in the head or in the brain? Ann Intern Med 134 (9 Pt 1): 783-5, 2001.11329237
Dy SM, Lorenz KA, Naeim A, et al.: Evidence-based recommendations for cancer fatigue, anorexia, depression, and dyspnea. J Clin Oncol 26 (23): 3886-95, 2008.18688057

## Dyspnea in Patients With Advanced Cancer

### Introduction

Dyspnea is an uncomfortable awareness of breathing. It is a subjective experience involving many factors that affect the quality and intensity of its perception. Patients with comparable degrees of functional lung impairment and disease burden may describe varying intensities of dyspnea, using various words and phrases such as "tightness" and "suffocating."[1]

Reports on the frequency of dyspnea also vary, depending on the setting and the extent of disease.[2] In one study, 49% of a general cancer population reported breathlessness, and 20% rated their breathlessness as moderate to severe.[3] Patients with advanced cancer experience dyspnea more frequently and more intensely than patients with limited disease. One study found that 75 of 135 patients with advanced cancer reporting to an outpatient palliative care clinic had moderate-to-severe dyspnea.[4] In addition, 60% of 289 patients with lung cancer reported breathlessness at presentation.[5] Results of a large study showed that 70% of patients suffered from dyspnea in the last 6 weeks of life.[6] About one-third of patients who could report the intensity of their dyspnea rated it as moderate to severe. Another study revealed that one-half of patients with advanced cancer scored their dyspnea as moderate to severe.[7]

### Pathophysiology and Etiology

The pathophysiological mechanisms of breathlessness are numerous and complex.[8] Peripheral and central mechanisms, as well as mechanical and chemical pathways, are involved with a variety of sensory afferent sources.[9-11]

The qualities of dyspnea can be seen as work/effort, tightness, and air hunger. The experience of excess work/effort is caused by sensory-perceptual mechanisms similar to those involved in muscles exercising. Tightness is caused by stimulation of airway receptors with bronchoconstriction. The intensity of air hunger and unsatisfied inspiration is caused by the following:[12]

- Imbalances of respiratory drive.
- Outgoing signals from the brain.
- Feedback from afferents in the respiratory system.

Dyspnea in patients with advanced cancer has many possible direct causes, and categorizing them can assist in the etiologic work-up. One approach is to divide direct causes into the following groups:

1. Direct tumor effects such as intrinsic or extrinsic airway obstruction, pleural involvement, parenchymal involvement by either primary or metastatic disease, superior vena cava syndrome, lymphangitic carcinomatosis, pericardial effusion, and postobstructive pneumonitis.
2. Indirect tumor effects such as pneumonia, a pulmonary embolus, paralysis of a hemidiaphragm, or weakening of the respiratory muscles from sarcopenia.
3. Treatment-related causes such as pulmonary fibrosis secondary to radiation therapy or chemotherapy, chemotherapy-induced cardiomyopathy, and immunotherapy-related pneumonitis from targeted therapy. Although uncommon, checkpoint inhibitor immunotherapy–related pneumonitis can be potentially severe or fatal.[13,14] This drug-induced pneumonitis is a diagnosis of exclusion; other differential diagnoses, including infection and worsening malignancy, need to be excluded.
4. Causes unrelated to cancer include chronic obstructive airway disease, congestive heart failure, anemia, certain acidotic states, and bronchospasm.
5. Functional causes (e.g., anxiety).

One study found that in patients experiencing dyspnea from advanced cancer, a median of five different abnormalities could have contributed to their shortness of breath.[7] Spirometry was abnormal in 93% of 100 patients examined, with 5% having obstructive patterns, 41% restrictive patterns, and 47% mixed patterns. Also, 49% of patients had lung cancer, 91% had abnormal chest radiographs, and 65% had parenchymal or pleural involvement. These results show that a subset of patients experience shortness of breath without any apparent lung involvement. The potentially correctable causes of dyspnea included:

- Hypoxia (40%).
- Anemia (20%).
- Bronchospasm (52%).

No significant association between the type of respiratory impairment and the degree of dyspnea was found. Most of these patients were current or former smokers and had a significant lowering of their maximum inspiratory pressures, suggesting severe respiratory muscle dysfunction.[7] This finding was duplicated in another study.[4] Of patients admitted to hospice care, 34% had histories of cardiac disease, and 24% had histories of respiratory disease.[6] Only 39% of terminally ill patients who reported dyspnea had lung or pleural involvement. The etiology of dyspnea could not be clearly identified in approximately one-quarter of patients. Another study found that 49% of lung cancer patients presented with airflow obstruction.[7,15]

Respiratory muscle dysfunction is an underrecognized factor contributing to dyspnea. Causes of respiratory muscle dysfunction include:[16]

- Neuromuscular disease.
- Malnutrition.
- Deficiencies of potassium, magnesium, and inorganic phosphate.

Poor oxygenation, muscle fatigue, abnormal cortisol and catecholamine levels, and circulating cytokines are also implicated.[16]

Although anxiety is commonly thought to be associated with breathlessness, researchers have found that anxiety and shortness of breath do not invariably go together.[7] One study demonstrated that the involvement of the lungs by cancer, anxiety, and poor maximal inspiratory pressures were correlates of the intensity of dyspnea in patients with advanced cancer.[4]

### Assessment

The multidimensional nature of dyspnea must be noted in the complicated assessment of this symptom. Patient-reported outcome is the gold standard for assessment of dyspnea. There is no consensus on the best instrument for assessing dyspnea, but some of the tools used include:

- Visual analog and numerical rating scales, which are commonly used.[8,17-19]
- Borg Scale, which is occasionally used.[17]
- Cancer Dyspnea Scale, a multidimensional instrument that has been shown to be valid and reliable in patients with advanced lung cancer. The subscales measure sense of effort (physical dimension), sense of anxiety (psychological dimension), and sense of discomfort.[20]

These tools are limited, however, because they are unidimensional and do not account for the relative contribution of different factors to a patient’s perception of breathlessness. Assessment should include the impact of dyspnea on the patient’s functional status and recognition of the dynamic component of dyspnea—namely, exertional dyspnea.

Objective signs, such as tachypnea or the use of accessory breathing muscles, frequently do not match a patient’s perception of dyspnea and the degree of functional impairment it causes. Numerous factors, including psychosocial issues, may affect a patient’s experience of dyspnea. Pulmonary function tests, with few exceptions, play a limited role in the assessment of this syndrome.

A comprehensive history and examination are essential to an accurate assessment of dyspnea.[8,17] The temporal onset, qualities of the symptom, associated symptoms, precipitating and relieving events or activities, and responses to medications should be reviewed. Sudden onset may herald a pulmonary embolism or infection, whereas gradual onset may suggest development of a pleural effusion. A history of obstructive airways or cardiac disease can shed some light on possible underlying causes. Investigations such as measuring oxygen saturation can be useful in determining whether a patient is hypoxic. In the setting of advanced, incurable cancer, arterial blood gasses play a limited role.

In the study looking at checkpoint inhibitor immunotherapy–related pneumonitis, one-third of patients were asymptomatic. However, the most common presenting symptoms were dyspnea (53%) and cough (35%).[13]

Melanoma and non-small cell lung cancer were the most common cancers treated in this study. Interestingly, the duration of treatment before the onset of pneumonitis was quite variable, with a median time to onset of 2.8 months (range, 9 days–19 months). In addition, pneumonitis seemed to occur earlier in patients who received combination therapy than in those who received monotherapy (median, 2.7 months vs. 4.6 months).[13]

Diagnostic tests that may help to determine the etiology of dyspnea include the following:[7]

- Chest imaging by radiography.
- Computed tomography.
- Complete blood counts.
- Oxygen saturation at rest and with exercise.
- Pulmonary function tests, to a much lesser extent.

Maximal inspiratory pressure (MIP) measurements may be helpful, particularly if no apparent cause can be found. MIP is a reliable functional test of the strength of the diaphragm and other respiratory muscles. Functional assessments such as the 6-minute walk test and exercise ergometry may also provide valuable information about the severity and impact of dyspnea.[21,22]

### Management of Dyspnea

#### Management of underlying causes

Lack of a clear understanding of the pathophysiological mechanisms underlying dyspnea hampers the clinician’s overall ability to effectively manage it.[8,17] As with all symptoms, it is essential to identify and treat the underlying cause(s) of dyspnea, if possible and when appropriate. Underlying causes (some of them potentially reversible) and their treatments include the following:

- Tumor obstruction (upper airways, bronchus, postobstructive pneumonitis, or superior vena cava): Radiation therapy, hormone therapy, or chemotherapy for sensitive tumors. Bronchoscope-guided cauterization or laser ablation of intraluminal masses in large airways can be considered when such technology and expertise are available.[23]
- Carcinomatous lymphangitis: A trial of corticosteroids, e.g., dexamethasone. The optimal dose is not clear. Chemotherapy should be considered in sensitive cancers.
- Superior vena cava obstruction: Chemotherapy for sensitive tumors, radiation therapy, stenting, opioids for dyspnea, and/or steroids as appropriate for the clinical context.
- Bronchospasms: Bronchodilators. The indiscriminate use of bronchodilators, particularly in the absence of bronchospasm, is discouraged. The treatment of underlying chronic obstructive disease should be optimized with bronchodilators and inhaled corticosteroids as appropriate, particularly because many patients may be current or former smokers.
- Postradiation bronchiolitis obliterans: A rare complication that occurs in 0.8% to 2.9% of women receiving radiation therapy for breast cancer.[24] Patients are usually treated with corticosteroids.
- Pleural effusions: Pleural aspiration by thoracentesis or chest drain. Pleurodesis in selected patients with recurrent effusions should be considered. Indwelling catheters are available for patients with recurrent effusions who are not suitable for pleurodesis.
- Pericardial effusions: Drainage for immediate relief and possibly intrapericardial chemotherapy or definitive surgery, depending on the clinical context and goals of care.
- Gross ascites: Abdominal paracentesis to relieve diaphragmatic splinting.
- Cardiac failure: Diuretics and other drugs as appropriate.
- Chest infections: Antibiotics and chest physiotherapy when appropriate.
- Anemia: Blood transfusions in select patients.
- Pulmonary embolism: Anticoagulate when appropriate.
- Checkpoint inhibitor immunotherapy–related pneumonitis: For patients with a severity of grade 2 or higher (based on the National Cancer Institute Common Terminology Criteria for Adverse Events [25]), withholding of drug treatment, administration of corticosteroids, and close follow-up. If pneumonitis worsens, additional immunosuppression may be considered, though its benefit is not clear.
- Anxiety: Psychotropic medications and psychotherapy.

#### Symptomatic management

Symptomatic management of dyspnea is based primarily on the following:

- Oxygen therapy.
- Opioids for palliation of dyspnea.
- Treatment of underlying causes (e.g., superimposed infection), when appropriate.

Opioids are an extremely effective treatment for dyspnea in cancer patients, and fear of side effects should not prevent their appropriate use. Most authorities believe that, if used appropriately, opioids do not hasten death in dyspneic cancer patients; rather, they reduce physical and psychological distress and exhaustion, and early use improves quality of life.[17,26,27] Clinically significant hypoventilation after opioid therapy depends largely on the history of previous exposure to opioids and the rate of increase of the opioid dose. As with opioid use in pain management, starting at a regular low dose in opioid-naïve patients, followed by appropriate dose titration, is advised. Opioid therapy for dyspnea is administered similarly to, and often concurrent with, opioid therapy for pain control. Most of the evidence supports the role of opioids in relieving dyspnea in malignant and nonmalignant conditions.[28,29][Level of evidence: I];[30-32][Level of evidence: II]

Anecdotal and experimental evidence suggest a role for nebulized opioid administration in the treatment of dyspnea.[33-35] Opioid receptors are present on sensory nerve endings in the airways; however, nebulization is an inefficient way of administering drugs.[33] Pharmacokinetic studies suggest that the systemic bioavailability of nebulized morphine is extremely poor and erratic, varying from 4% to 8%.[36] Some patients may experience claustrophobia. The evidence does not support the clinical use of nebulized opioids. More clinical trials are needed to better determine the role of this mode of treatment.

Patients who are hypoxic in room air are likely to benefit from oxygen therapy, probably through a decrease in the chemoreceptor input to the respiratory center and the brain cortex. In two controlled trials, cancer patients with dyspnea who were randomly assigned to oxygen therapy in a crossover design showed significant improvement in their dyspnea.[37,38][Level of evidence: I] The role of supplemental oxygen has also been examined in patients without hypoxemia in a large randomized controlled trial. Supplemental oxygen given at 2 L/min did not significantly improve dyspnea, compared with supplemental air.[39] Therefore, supplemental oxygen is recommended for cancer patients with hypoxemia but not for those without hypoxemia.

Other investigators have examined the effect of other oxygen delivery modalities on dyspnea in cancer patients, such as:[40]

- High-flow oxygen. High-flow oxygen devices deliver up to 40 L of humidified and heated oxygen per minute, and may reduce the intensity of dyspnea in patients who do not respond to low-flow oxygen.[40]
- Noninvasive ventilation with bilevel positive airway pressure (BiPAP). BiPAP has been shown in several randomized controlled trials to alleviate dyspnea among hospitalized cancer patients,[40,41] particularly in patients with hypoventilation.

These interventions may be reasonable options for patients with hypoxemia and refractory dyspnea despite the use of low-flow supplemental oxygen.

Other options for symptomatic treatment include:

- Methylxanthines.
- Sedatives.
- Tranquilizers.
- Nebulized local anesthetics.
- Antiprostaglandins.

The role of methylxanthines in cancer-related dyspnea is unclear. Chlorpromazine and promethazine have been shown to decrease dyspnea without affecting ventilation in patients without cancer, but their role in cancer-related dyspnea is uncertain. Four out of five randomized controlled trials failed to show any benefit for using benzodiazepines in cancer patients.[17];[42][Level of evidence: I]

One randomized single-blind study suggested that the combination of two scheduled medications (subcutaneous morphine and subcutaneous midazolam) and one as needed (subcutaneous morphine) for episodes of breakthrough dyspnea is more effective than the other evaluated combinations, but this approach requires further study.[43][Level of evidence: I]

The role of benzodiazepines appears to be limited to treatment of dyspnea that is a somatic manifestation of a panic disorder or that is concurrent with severe anxiety. In a randomized placebo-controlled trial of 432 cancer patients with moderate-to-severe dyspnea, 20 mg of buspirone, a nonbenzodiazepine anxiolytic drug, did not improve dyspnea or anxiety, compared with placebo.[44][Level of evidence: I] Buspirone cannot be recommended at this time for the treatment of dyspnea in cancer patients. No evidence supports the use of nebulized local anesthetics for the treatment of breathlessness.

Given the role inflammation may play in cancer and dyspnea, dexamethasone has been used for symptomatic treatment of dyspnea. A randomized controlled trial prospectively evaluated dexamethasone in a highly selected group of ambulatory patients who had an average dyspnea score of 4 or greater (on a numerical scale of 0–10).[45][Level of evidence: I] Patients were randomly assigned to receive dexamethasone 8 mg bid for 1 week, then 4 mg bid for 1 week versus a matching placebo. In-person assessments were taken at baseline, day 7, and day 14, as well as telephone assessments every other day from day 1 to day 28. Assessments included average dyspnea intensity, activity-adjusted dyspnea, and dyspnea unpleasantness via a numerical rating scale. Dyspnea was also measured via maximal inspiratory pressure and spirometry. The trial was terminated at the second preplanned interim analysis for futility. A clinically meaningful improvement in dyspnea was seen in both the placebo and the dexamethasone groups, leading to the conclusion that high-dose dexamethasone should not be given routinely to alleviate cancer-related dyspnea. Interestingly, the patients who took dexamethasone had significantly better appetite and well-being scores but worse anxiety, depression, and adverse events.

#### General support measures

In addition to pharmacological therapies, a number of nonpharmacological measures are suggested for the treatment of dyspnea. These measures include:

- Pursed-lip breathing.
- Diaphragmatic breathing and muscle training.
- Cold air directed across the cheek.
- Meditation.
- Relaxation training.
- Biofeedback techniques.
- Psychotherapy.

The effectiveness of these measures in relieving breathlessness appears to be variable.

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Wilcock A, Crosby V, Hughes A, et al.: Descriptors of breathlessness in patients with cancer and other cardiorespiratory diseases. J Pain Symptom Manage 23 (3): 182-9, 2002.11888716
Ripamonti C, Fulfaro F, Bruera E: Dyspnoea in patients with advanced cancer: incidence, causes and treatments. Cancer Treat Rev 24 (1): 69-80, 1998.9606369
Dudgeon DJ, Kristjanson L, Sloan JA, et al.: Dyspnea in cancer patients: prevalence and associated factors. J Pain Symptom Manage 21 (2): 95-102, 2001.11226761
Bruera E, Schmitz B, Pither J, et al.: The frequency and correlates of dyspnea in patients with advanced cancer. J Pain Symptom Manage 19 (5): 357-62, 2000.10869876
Muers MF, Round CE: Palliation of symptoms in non-small cell lung cancer: a study by the Yorkshire Regional Cancer Organisation Thoracic Group. Thorax 48 (4): 339-43, 1993.7685550
Reuben DB, Mor V: Dyspnea in terminally ill cancer patients. Chest 89 (2): 234-6, 1986.3943383
Dudgeon DJ, Lertzman M: Dyspnea in the advanced cancer patient. J Pain Symptom Manage 16 (4): 212-9, 1998.9803048 99019889
Ripamonti C, Bruera E: Dyspnea: pathophysiology and assessment. J Pain Symptom Manage 13 (4): 220-32, 1997.9136233
Widdicombe J: Lung afferent activity: implications for respiratory sensation. Respir Physiol Neurobiol 167 (1): 2-8, 2009.18952010
Lee LY: Respiratory sensations evoked by activation of bronchopulmonary C-fibers. Respir Physiol Neurobiol 167 (1): 26-35, 2009.18586581
Undem BJ, Nassenstein C: Airway nerves and dyspnea associated with inflammatory airway disease. Respir Physiol Neurobiol 167 (1): 36-44, 2009.19135556
Parshall MB, Schwartzstein RM, Adams L, et al.: An official American Thoracic Society statement: update on the mechanisms, assessment, and management of dyspnea. Am J Respir Crit Care Med 185 (4): 435-52, 2012.22336677
Naidoo J, Wang X, Woo KM, et al.: Pneumonitis in Patients Treated With Anti-Programmed Death-1/Programmed Death Ligand 1 Therapy. J Clin Oncol 35 (7): 709-717, 2017.27646942
Khunger M, Rakshit S, Pasupuleti V, et al.: Incidence of Pneumonitis With Use of Programmed Death 1 and Programmed Death-Ligand 1 Inhibitors in Non-Small Cell Lung Cancer: A Systematic Review and Meta-Analysis of Trials. Chest 152 (2): 271-281, 2017.28499515
Congleton J, Muers MF: The incidence of airflow obstruction in bronchial carcinoma, its relation to breathlessness, and response to bronchodilator therapy. Respir Med 89 (4): 291-6, 1995.7597269
Mancini DM, LaManca J, Henson D: The relation of respiratory muscle function to dyspnea in patients with heart failure. Heart Fail 8: 183-9, 1992.
Dudgeon DJ, Rosenthal S: Management of dyspnea and cough in patients with cancer. Hematol Oncol Clin North Am 10 (1): 157-71, 1996.8821565
Bausewein C, Farquhar M, Booth S, et al.: Measurement of breathlessness in advanced disease: a systematic review. Respir Med 101 (3): 399-410, 2007.16914301
Dorman S, Byrne A, Edwards A: Which measurement scales should we use to measure breathlessness in palliative care? A systematic review. Palliat Med 21 (3): 177-91, 2007.17363394
Henoch I, Bergman B, Gaston-Johansson F: Validation of a Swedish version of the Cancer Dyspnea Scale. J Pain Symptom Manage 31 (4): 353-61, 2006.16632083
American Thoracic Society, American College of Chest Physicians: ATS/ACCP Statement on cardiopulmonary exercise testing. Am J Respir Crit Care Med 167 (2): 211-77, 2003.12524257
ATS Committee on Proficiency Standards for Clinical Pulmonary Function Laboratories: ATS statement: guidelines for the six-minute walk test. Am J Respir Crit Care Med 166 (1): 111-7, 2002.12091180
Mantovani G, Astara G, Manca G, et al.: Endoscopic laser ablation as palliative treatment of endobronchial, nonresectable, or recurrent lung cancer: assessment of its impact on quality of life. Clin Lung Cancer 1 (4): 277-85; discussion 286, 2000.14733632
Epler GR, Kelly EM: Systematic review of postradiotherapy bronchiolitis obliterans organizing pneumonia in women with breast cancer. Oncologist 19 (12): 1216-26, 2014.25361622
National Cancer Institute: Common Terminology Criteria for Adverse Events (CTCAE), Version 5.0. Bethesda, Md: U.S. Department of Health and Human Services, National Institutes of Health, 2017. Available online (https://ctep.cancer.gov/protocolDevelopment/electronic_applications/docs/CTCAE_v5_Quick_Reference_8.5x11.pdf). Last accessed Dec. 18, 2024.
Bruera E, Ripamonti C: Dyspnea in patients with advanced cancer. In: Berger A, Portenoy RK, Weissman DE, eds.: Principles and Practice of Supportive Oncology. Lippincott-Raven Publishers, 1998, pp 295-307.
Kloke M, Cherny N; ESMO Guidelines Committee: Treatment of dyspnoea in advanced cancer patients: ESMO Clinical Practice Guidelines. Ann Oncol 26 (Suppl 5): v169-73, 2015.26314777
Bruera E, MacEachern T, Ripamonti C, et al.: Subcutaneous morphine for dyspnea in cancer patients. Ann Intern Med 119 (9): 906-7, 1993.8215003
Allard P, Lamontagne C, Bernard P, et al.: How effective are supplementary doses of opioids for dyspnea in terminally ill cancer patients? A randomized continuous sequential clinical trial. J Pain Symptom Manage 17 (4): 256-65, 1999.10203878
Bruera E, Macmillan K, Pither J, et al.: Effects of morphine on the dyspnea of terminal cancer patients. J Pain Symptom Manage 5 (6): 341-4, 1990.2269800
Cohen MH, Anderson AJ, Krasnow SH, et al.: Continuous intravenous infusion of morphine for severe dyspnea. South Med J 84 (2): 229-34, 1991.1899295
Boyd KJ, Kelly M: Oral morphine as symptomatic treatment of dyspnoea in patients with advanced cancer. Palliat Med 11 (4): 277-81, 1997.9373578
Zeppetella G: Nebulized morphine in the palliation of dyspnoea. Palliat Med 11 (4): 267-75, 1997.9373577
Farncombe M, Chater S: Clinical application of nebulized opioids for treatment of dyspnoea in patients with malignant disease. Support Care Cancer 2 (3): 184-7, 1994.7518312
Farncombe M, Chater S, Gillin A: The use of nebulized opioids for breathlessness: a chart review. Palliat Med 8 (4): 306-12, 1994.7529103
Masood AR, Thomas SH: Systemic absorption of nebulized morphine compared with oral morphine in healthy subjects. Br J Clin Pharmacol 41 (3): 250-2, 1996.8866928
Bruera E, de Stoutz N, Velasco-Leiva A, et al.: Effects of oxygen on dyspnoea in hypoxaemic terminal-cancer patients. Lancet 342 (8862): 13-4, 1993.8100289
Bruera E, Schoeller T, MacEachern T: Symptomatic benefit of supplemental oxygen in hypoxemic patients with terminal cancer: the use of the N of 1 randomized controlled trial. J Pain Symptom Manage 7 (6): 365-8, 1992.1517652
Abernethy AP, McDonald CF, Frith PA, et al.: Effect of palliative oxygen versus room air in relief of breathlessness in patients with refractory dyspnoea: a double-blind, randomised controlled trial. Lancet 376 (9743): 784-93, 2010.20816546
Hui D, Morgado M, Chisholm G, et al.: High-flow oxygen and bilevel positive airway pressure for persistent dyspnea in patients with advanced cancer: a phase II randomized trial. J Pain Symptom Manage 46 (4): 463-73, 2013.23739633
Nava S, Ferrer M, Esquinas A, et al.: Palliative use of non-invasive ventilation in end-of-life patients with solid tumours: a randomised feasibility trial. Lancet Oncol 14 (3): 219-27, 2013.23406914
Moroni M, Porta C, Gualtieri G, et al.: Inhaled sodium cromoglycate to treat cough in advanced lung cancer patients. Br J Cancer 74 (2): 309-11, 1996.8688342
Navigante AH, Cerchietti LC, Castro MA, et al.: Midazolam as adjunct therapy to morphine in the alleviation of severe dyspnea perception in patients with advanced cancer. J Pain Symptom Manage 31 (1): 38-47, 2006.16442481
Peoples AR, Bushunow PW, Garland SN, et al.: Buspirone for management of dyspnea in cancer patients receiving chemotherapy: a randomized placebo-controlled URCC CCOP study. Support Care Cancer 24 (3): 1339-47, 2016.26329396
Hui D, Puac V, Shelal Z, et al.: Effect of dexamethasone on dyspnoea in patients with cancer (ABCD): a parallel-group, double-blind, randomised, controlled trial. Lancet Oncol 23 (10): 1321-1331, 2022.36087590

## Chronic Cough

Chronic coughing may be the source of major suffering for some patients.[1] Chronic cough can:

- Cause pain.
- Interfere with sleep.
- Aggravate dyspnea.
- Worsen fatigue.

The causes of cough can be classified much like the causes of dyspnea.

For chronic cough in patients receiving palliative care, consider the following differential diagnoses:

- Malignancy-related causes of cough, e.g., direct irritation by the presence of a tumor or tracheo-esophageal fistula.
- Drug-related cough: rule out cough induced by medications such as angiotensin-converting enzyme inhibitors.
- Other noncancer causes of cough: rule out asthma, chronic obstructive pulmonary disease, postnasal drip, reflux issues, and chronic heart failure.

The optimal therapy for chronic cough is treatment of the underlying disorder, such as:

- Radiation therapy for the underlying endobronchial tumor mass irritating the airway.
- Stenting of tracheo-esophageal fistula.
- Drainage of a pleural effusion.
- Corticosteroids for lymphangitic carcinomatosis.

Cough-suppressing agents such as opioids are commonly used. Anecdotal evidence suggests a role for inhaled local anesthetics, which should be used judiciously and sparingly because of their unpleasant taste, suppression of the gag reflex, and anaphylactic reactions to preservatives in these solutions. Opioid and nonopioid antitussives, such as dextromethorphan, may act synergistically, but further studies are required to confirm this hypothesis.[1] Gabapentin was found to be efficacious compared with placebo for chronic refractory cough, although this study did not include cancer patients.[2]

In cases of increased sputum production, expectorants and mucolytics have been used, but the effects have not been well evaluated. Inhaled sodium cromoglycate has shown promise as a safe method of controlling chronic coughing related to lung cancer.[3]

### References

Dudgeon DJ, Rosenthal S: Management of dyspnea and cough in patients with cancer. Hematol Oncol Clin North Am 10 (1): 157-71, 1996.8821565
Ryan NM, Birring SS, Gibson PG: Gabapentin for refractory chronic cough: a randomised, double-blind, placebo-controlled trial. Lancet 380 (9853): 1583-9, 2012.22951084
Moroni M, Porta C, Gualtieri G, et al.: Inhaled sodium cromoglycate to treat cough in advanced lung cancer patients. Br J Cancer 74 (2): 309-11, 1996.8688342

## Malignant Pleural Effusion

### Significance

Malignant pleural effusions are a common complication of malignancy, and malignancy is a common cause of pleural effusions in general. Malignancy causes roughly 40% of symptomatic pleural effusions, with congestive heart failure and infection being the other leading causes.[1] The cancers that account for approximately 75% of all malignancy-associated effusions include the following:

- Lung cancer.
- Breast cancer.
- Lymphoma.
- Leukemia.

Significant use of health care resources is attributable to malignant effusions, with approximately 100,000 cases per year diagnosed in the United States and 43 cases detected per 100,000 hospital admissions.[2]

### Pathogenesis

The normal pleural fluid space is occupied with approximately 10 mL of fluid with 2 g/dL protein. A pleural effusion is an accumulation of an abnormal amount of fluid between the visceral and parietal pleura of the chest. Normally, pleural fluid is absorbed by pulmonary venous capillaries (80%–90%), with some of it also absorbed by pleural lymphatics. Malignant effusions are usually exudative rather than transudative. Exudative effusions exhibit any one of the following characteristics:[3]

- Pleural fluid to serum protein ratio greater than 0.5.
- Pleural fluid to serum lactate dehydrogenase (LDH) ratio greater than 0.6.
- Pleural fluid LDH greater than two-thirds of the upper limit of serum LDH.

These exudative malignant effusions are generally caused by:

- Pleural metastases.
- Disruption of pulmonary capillary endothelium.
- Malignant obstruction of pleural lymphatics.

Paramalignant effusions may result from chemotherapy, radiation therapy, atelectasis, or lymph node involvement.

### Assessment

Common symptoms associated with malignant pleural effusions include:

- Dyspnea.
- Cough.
- Chest discomfort.

About 20% of patients may experience weight loss and malaise. A chest x-ray is most commonly used for radiographic assessment. About 175 mL of pleural fluid will cause a blunted costophrenic angle discernible on chest radiography. A chest computed tomography scan is more sensitive than a simple chest x-ray and is often used for assessment of loculated effusions because, in some instances, up to 500 mL of loculated fluid can be obscured behind the dome of the diaphragm.[1]

Not all pleural effusions detected in cancer patients are malignant effusions. Cancer patients are prone to developing conditions such as:[1]

- Congestive heart failure.
- Pneumonia.
- Pulmonary embolism.
- Malnutrition.
- Associated low serum albumin.

Each of these conditions may cause a symptomatic effusion for which clinical management would substantially differ from management of a malignant effusion. For this reason, cytological assessment is important. Pleural fluid cytology requires a minimum sample of 250 mL. The morphology of cells obtained from the pleural space can be difficult to assess because of mesothelial and macrophage abnormalities. The diagnostic sensitivity of pleural fluid cytology is approximately 65%, with a specificity of 97%.[1]

- Flow cytometry can be applied to these specimens and is often useful, especially for assessment of lymphomas.
- Thoracoscopy and pleural biopsy are rarely needed for a definitive diagnosis, but these techniques may be useful when routine pleural fluid collection and assessment are difficult because of loculation of the effusion.
- Thoracoscopy-guided biopsy is generally performed under local anesthesia and has a yield of more than 80%, with a lower risk of complications than thoracotomy.

### Management of Malignant Pleural Effusions

#### To treat or not to treat

Pleural effusions are generally markers of advanced, unresectable disease or disease progression. The median survival for patients with malignant pleural effusions is around 3 to 4 months.[4,5] Because a paramalignant effusion resulting from pneumonia or atelectasis may be present, the cytology should be confirmed before making major treatment decisions. The management strategy depends on the underlying primary malignancy and the number and type of previous therapies. For example, patients with newly diagnosed small cell carcinoma or malignant lymphoma are likely to respond to systemic chemotherapy; however, patients with gastric or ovarian cancer in whom several lines of chemotherapy have failed are unlikely to obtain significant palliation with systemic therapy.

About three-quarters of patients exhibit symptoms such as cough, dyspnea, and chest discomfort. Such patients may benefit from efforts to reduce the fluid burden, depending on the following:

- Their performance status.
- Their expected survival.
- Their preference for risks versus benefits.

The literature on the efficacy of treatment for pleural effusions is difficult to interpret because of the paucity of randomized trials, and wide variability in the response criteria and the timing and duration of follow-up in uncontrolled trials.[6,7] Generally, the goal of therapy is palliation of symptoms. Measures of success may include:

- Complete drainage of the effusion.
- Lung re-expansion.
- Lack of fluid reaccumulation (i.e., duration of response).
- Subjective report of symptom relief.

The choice of treatment depends on patient prognosis, functional status, and goals of care.

#### Thoracentesis

Thoracentesis involves percutaneous insertion of a needle for drainage of the effusion. Thoracentesis is not expected to permanently resolve the problem but rather to alleviate acute and severe symptoms. The use of thoracentesis is also appropriate as a therapeutic trial to determine whether fluid drainage is beneficial when the relationship between symptoms and effusion is unclear.

Most effusions will reaccumulate a few days after thoracentesis. The reaccumulation rate is approximately 98% by day 30.[8] Repeated thoracenteses carry the potential risks of bleeding, infection, and pneumothorax. Other potential complications of thoracentesis include noncardiogenic pulmonary edema from rapid lung re-expansion (usually with the rapid removal of >1,500 mL) and pleural shock caused by an excessive vagal response to penetration of the parietal pleura. Any of these complications may be lethal, especially for the cancer patient with poor cardiopulmonary reserve.

#### Chronic long-term indwelling tunneled pleural catheters

Indwelling pleural catheters (IPCs) represent an alternative to pleurodesis for patients with malignant pleural effusion whose dyspnea has responded to thoracentesis. IPCs are relatively contraindicated in patients with a short life expectancy, pleural infections, multiloculated collections, and chylothorax. The insertion of chronic long-term indwelling tunneled pleural catheters is useful to treat recurrent and symptomatic malignant pleural effusions, including for patients with trapped lung. These tunneled pleural catheters allow up to 96% of patients to achieve symptom improvement, with spontaneous pleurodesis occurring in up to 44% of patients.[9] Published results indicate significantly shorter hospital stays for patients with IPCs versus those receiving doxycycline pleurodesis (1 day vs. 6 days). In the IPC group, spontaneous pleurodesis was achieved in 42 of 91 patients. Both the IPC group and doxycycline pleurodesis group reported modest improvement in quality of life (QOL) and dyspnea.[10]

A randomized controlled trial comparing IPC and talc pleurodesis showed similar reduction of dyspnea (24 mm of 100 mm) and similar QOL.[11] IPC use was associated with a shorter initial hospitalization and lower rates of re-treatment, with a spontaneous pleurodesis rate of 51%. However, IPCs also had higher rates of adverse effects, such as infections and catheter blockage. A second randomized controlled trial compared the effect of IPC versus talc pleurodesis on the total number of hospitalization days from procedure to death or to 12 months.[12] There was a statistically significant reduction in the number of hospitalization days for patients with IPCs compared with those who received talc pleurodesis (median,10 days [interquartile range (IQR), 3–17] vs. 12 days [IQR, 7–21], respectively; P = .03). IPC use also resulted in fewer hospitalization days related to pleural effusion management and fewer additional invasive pleural drainage procedures. There were no significant differences in improvement in breathlessness or QOL between the two procedures. The choice between IPC and pleurodesis should be based on patient preference and local resource availability.

#### Use of pleural sclerosing agents after chest tube drainage

Chemical sclerosants may be administered through a chest tube to create inflammation and subsequent fusion of the parietal and visceral pleura so that fluid cannot reaccumulate in this potential space. Numerous chemical agents can cause the irritation necessary to produce this kind of fusion, called pleurodesis. The ideal agent would produce effective pleurodesis with minimal cost and minimal side effects. Agents that have been studied include:

- Chemotherapeutic agents (bleomycin, cisplatin, etoposide, doxorubicin, mitomycin-C, fluorouracil).
- Antibiotics (doxycycline, minocycline, tetracycline).
- Infectious agents (Corynebacterium parvum).
- Biological agents (interferon beta, interleukin-2).
- Bovine dermal collagen.[13][Level of evidence: II]
- Other agents (talc, methylprednisolone).

Several uncontrolled trials and case series have reported the efficacy of pleurodesis,[14];[15,16][Level of evidence: II];[17,18] as have numerous randomized trials.[19-25][Level of evidence: I] A meta-analysis of pleurodesis studies that were reported between 1966 and 1992 indicated that about two-thirds of patients responded to pleurodesis, and that the most effective agents appeared to be tetracyclines (or tetracycline replacement agents, such as doxycycline and minocycline), bleomycin, and talc.[26]

A prospective, randomized study of video-assisted thoracoscopic pleurodesis with talc versus doxycycline in 33 patients with malignant pleural effusion suggested that talc provides superior short-term and long-term results.[27][Level of evidence: I] Talc appears to be the least expensive agent, at least when given as a slurry rather than by video-assisted thoracoscopic talc insufflation.[25][Level of evidence: I] However, bleomycin is the only agent approved by the U.S. Food and Drug Administration for the prevention of recurrent pleural effusions.[1] An observational cohort study investigated the use of intrapleural urokinase in 48 patients with loculated pleural effusions or trapped lungs. Lung reexpansion and resolution of dyspnea occurred in approximately 60% of patients, suggesting that intrapleural urokinase may be useful in treating loculated pleural effusions or trapped lungs in medically inoperable patients with cancer. Most responders maintained pleurodesis when urokinase was followed by minocycline pleurodesis.[28][Level of evidence: II]

#### Surgical treatment

For rare patients, standard management of the malignant effusion is unsuccessful and aggressive treatment remains appropriate. Pleuroperitoneal shunting can be considered for these patients. This procedure involves implantation of a shunt with one-way valves that allow the transfer of fluid from the pleural space to the peritoneal space, in which the fluid creates less hazard and is more easily removed. Another option is surgical pleurectomy, which requires general anesthesia. The risk of significant acute and chronic pain as well as other morbidity approaches 20% to 25%, and the risk of mortality at 1 month is 5% to 10%.[2]

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Maghfoor I, Doll DC, Yarbro JW: Effusions. In: Abeloff MD, Armitage JO, Lichter AS, et al., eds.: Clinical Oncology. Churchill Livingstone, 2000, pp 922-49.
Fiocco M, Krasna MJ: The management of malignant pleural and pericardial effusions. Hematol Oncol Clin North Am 11 (2): 253-65, 1997.9137969 97283893
Light RW: Useful tests on the pleural fluid in the management of patients with pleural effusions. Curr Opin Pulm Med 5 (4): 245-9, 1999.10407695 99336033
Burrows CM, Mathews WC, Colt HG: Predicting survival in patients with recurrent symptomatic malignant pleural effusions: an assessment of the prognostic values of physiologic, morphologic, and quality of life measures of extent of disease. Chest 117 (1): 73-8, 2000.10631202
Sahn SA: Malignant pleural effusions. Semin Respir Crit Care Med 22 (6): 607-16, 2001.16088704
Tattersall M: Management of malignant pleural effusion. Aust N Z J Med 28 (3): 394-6, 1998.9673756
Schafers SJ, Dresler CM: Update on talc, bleomycin, and the tetracyclines in the treatment of malignant pleural effusions. Pharmacotherapy 15 (2): 228-35, 1995 Mar-Apr.7542766
Anderson CB, Philpott GW, Ferguson TB: The treatment of malignant pleural effusions. Cancer 33 (4): 916-22, 1974.4362107
Tremblay A, Michaud G: Single-center experience with 250 tunnelled pleural catheter insertions for malignant pleural effusion. Chest 129 (2): 362-8, 2006.16478853
Putnam JB, Light RW, Rodriguez RM, et al.: A randomized comparison of indwelling pleural catheter and doxycycline pleurodesis in the management of malignant pleural effusions. Cancer 86 (10): 1992-9, 1999.10570423
Davies HE, Mishra EK, Kahan BC, et al.: Effect of an indwelling pleural catheter vs chest tube and talc pleurodesis for relieving dyspnea in patients with malignant pleural effusion: the TIME2 randomized controlled trial. JAMA 307 (22): 2383-9, 2012.22610520
Thomas R, Fysh ETH, Smith NA, et al.: Effect of an Indwelling Pleural Catheter vs Talc Pleurodesis on Hospitalization Days in Patients With Malignant Pleural Effusion: The AMPLE Randomized Clinical Trial. JAMA 318 (19): 1903-1912, 2017.29164255
Akopov AL, Egorov VI, Varlamov VV, et al.: Thoracoscopic collagen pleurodesis in the treatment of malignant pleural effusions. Eur J Cardiothorac Surg 28 (5): 750-3, 2005.16198593
Gravelyn TR, Michelson MK, Gross BH, et al.: Tetracycline pleurodesis for malignant pleural effusions. A 10-year retrospective study. Cancer 59 (11): 1973-7, 1987.2436744
Markman M, Cleary S, King ME, et al.: Cisplatin and cytarabine administered intrapleurally as treatment of malignant pleural effusions. Med Pediatr Oncol 13 (4): 191-3, 1985.4040205
Heffner JE, Standerfer RJ, Torstveit J, et al.: Clinical efficacy of doxycycline for pleurodesis. Chest 105 (6): 1743-7, 1994.8205870
Holoye PY, Jeffries DG, Dhingra HM, et al.: Intrapleural etoposide for malignant effusion. Cancer Chemother Pharmacol 26 (2): 147-50, 1990.2189591
Ostrowski MJ, Priestman TJ, Houston RF, et al.: A randomized trial of intracavitary bleomycin and Corynebacterium parvum in the control of malignant pleural effusions. Radiother Oncol 14 (1): 19-26, 1989.2467327
Martínez-Moragón E, Aparicio J, Rogado MC, et al.: Pleurodesis in malignant pleural effusions: a randomized study of tetracycline versus bleomycin. Eur Respir J 10 (10): 2380-3, 1997.9387969
Emad A, Rezaian GR: Treatment of malignant pleural effusions with a combination of bleomycin and tetracycline. A comparison of bleomycin or tetracycline alone versus a combination of bleomycin and tetracycline. Cancer 78 (12): 2498-501, 1996.8952557
Zimmer PW, Hill M, Casey K, et al.: Prospective randomized trial of talc slurry vs bleomycin in pleurodesis for symptomatic malignant pleural effusions. Chest 112 (2): 430-4, 1997.9266880
Patz EF, McAdams HP, Erasmus JJ, et al.: Sclerotherapy for malignant pleural effusions: a prospective randomized trial of bleomycin vs doxycycline with small-bore catheter drainage. Chest 113 (5): 1305-11, 1998.9596311
Yim AP, Chan AT, Lee TW, et al.: Thoracoscopic talc insufflation versus talc slurry for symptomatic malignant pleural effusion. Ann Thorac Surg 62 (6): 1655-8, 1996.8957368
Nio Y, Nagami H, Tamura K, et al.: Multi-institutional randomized clinical study on the comparative effects of intracavital chemotherapy alone versus immunotherapy alone versus immunochemotherapy for malignant effusion. Br J Cancer 80 (5-6): 775-85, 1999.10360655
Noppen M, Degreve J, Mignolet M, et al.: A prospective, randomised study comparing the efficacy of talc slurry and bleomycin in the treatment of malignant pleural effusions. Acta Clin Belg 52 (5): 258-62, 1997.9489119
Walker-Renard PB, Vaughan LM, Sahn SA: Chemical pleurodesis for malignant pleural effusions. Ann Intern Med 120 (1): 56-64, 1994.8250457 94071328
Kuzdzał J, Sładek K, Wasowski D, et al.: Talc powder vs doxycycline in the control of malignant pleural effusion: a prospective, randomized trial. Med Sci Monit 9 (6): PI54-9, 2003.12824959
Hsu LH, Soong TC, Feng AC, et al.: Intrapleural urokinase for the treatment of loculated malignant pleural effusions and trapped lungs in medically inoperable cancer patients. J Thorac Oncol 1 (5): 460-7, 2006.17409900

## Malignant Pericardial Effusion

Malignant pericardial effusions occur in up to 21% of cancer patients [1-3] and are frequently not suspected until clinical signs or symptoms of pericardial tamponade develop.[4] Two-thirds of patients have subclinical pericardial effusions with no overt cardiovascular signs or symptoms.[5,6] One-half of cases of pericardial effusion initially present with symptoms of cardiac tamponade.[7] In 50% of cases, pericardial effusion is the first sign of malignant disease.[8] Symptoms of pericardial effusion are often attributed to the underlying cancer and may include the following:[9]

- Dyspnea.
- Fatigue.
- Asthenia.

Symptomatic pericardial effusions are often a preterminal event; however, significant symptom palliation can be achieved with prompt diagnosis and management.

Of patients with malignant pericardial effusions, 50% will have concomitant pleural effusions, and one-third will have pulmonary parenchymal disease.[4]

One-third of patients with pericardial metastases will eventually die of pericardial tamponade.[4] Pericardial involvement contributed to the cause of death in 85% of patients in a series reported in 1962 but in only 46% of patients in a more recent study.[10] Improvements in diagnostic and therapeutic options account for the decrease in mortality over the past 40 years.

### Incidence and Prevalence

Malignant pericardial effusion occurs in up to 21% of autopsy cases in patients with common malignancies.[4,7] Of patients with lung cancer, 33% have pericardial metastases at autopsy, and one-third of cases of pericardial metastases are caused by lung cancer. Breast cancer causes 25% of pericardial effusions, and about 25% of patients with breast cancer have pericardial effusions. Hematological malignancies (leukemia, Hodgkin disease, non-Hodgkin lymphoma) cause 15% of cases of malignant pericardial effusions.[11]

A retrospective review of 23,592 effusions over a 24-year period revealed 65 malignant effusions (17%) out of 375 pericardial effusions. Lung cancer was the most common cancer found among the malignant pericardial effusions in males, and breast cancer was the most common in females. In 43% of cases, pericardial effusion was the first detected sign of cancer. Of patients diagnosed with malignant pericardial effusions, 86% died within 1 year of diagnosis, with nearly one-third dying within the first month.[8]

In a study of 31 patients with both cancer and pericardial effusions, malignant pericardial effusion accounted for 58% of the effusions, benign idiopathic pericarditis caused 32% of the cases, and radiation pericarditis caused 10% of cases.[11,12]

### Pathophysiology

Malignant involvement of the pericardium is the most common reason for development of pericardial effusions, which result from blockage of venous and lymphatic circulation of pericardial fluid. Such blockage may be caused by primary malignancy of the pericardium, such as pericardial mesothelioma, or by tumors arising in the myocardium, including angiosarcoma, rhabdomyosarcoma, and malignant fibrous histiocytosis. Malignancies can also involve the pericardium through direct extension from carcinomas of the lung or esophagus, thymoma, or lymphoma.[9] Lymphatic or hematogenous metastasis to the pericardium occurs most commonly with the following cancers:

- Carcinomas of the breast and lung.
- Leukemia.
- Lymphoma.
- Melanoma.

Primary tumors of the pleura or pericardium have been termed primary intrathoracic malignant effusions.[13]

Nonmalignant causes of pericardial effusion include:[14-16]

- Pericarditis.
- Myocardial infarction.
- Uremia.
- Hypothyroidism.
- Systemic lupus erythematosus.
- Trauma.
- Postsurgical pericardiotomy syndrome.
- Intrapericardial hematomas.

AIDS may also cause pericardial effusion with pericarditis.[17] Radiation therapy or chemotherapy drugs can cause pericarditis without metastatic involvement of the pericardium. Radiation pericarditis is usually associated with radiation doses to the cardiac window exceeding 30 Gy [10] and occurs most frequently in patients who have received mediastinal radiation for Hodgkin lymphoma or breast cancer.[10] Doxorubicin and cyclophosphamide have been associated with the development of acute pericarditis with effusions.[11,12] Other drugs that may cause acute pericarditis include procainamide, hydralazine, isoniazid, methysergide, phenytoin, and anticoagulants.

Pericardial tamponade results from progressive fluid accumulation in the pericardial sac, causing the following:[15]

- Elevated intrapericardial pressure.
- Diminished stroke volume.
- Decreased cardiac output.
- Progressive decrease in cardiac diastolic filling.
- Hemodynamic compromise resulting in death if not treated.

Hemodynamic compromise occurs when the normal amount of pericardial fluid (approximately 15–50 mL) increases to 200 mL to 1,800 mL.[15,18] When fluid accumulates rapidly, as little as 250 mL of fluid can result in tamponade.[11,19]

Dyspnea occurs in 93% of patients with pericardial effusions.[6] Common symptoms include the following:

- Cough.
- Chest pain.
- Orthopnea (discomfort with breathing while lying flat).

Other symptoms of pericardial effusion include:

- Upper abdominal distention or pressure caused by downward hepatic distention.
- Hiccups resulting from pressure on the diaphragm.
- Pleuritic pain caused by stretching of the pericardium (especially when lying flat).

Signs of effusion include the following:

- Kussmaul’s sign (increased distention of jugular veins with inspiration).
- Friedreich's sign (rapid diastolic descent of the venous pulse).
- Pulsus paradoxus (decrease of more than 10 mm Hg in the diastolic pressure on inspiration).

Pericardial friction rubs and fever are more commonly associated with nonmalignant causes of pericardial effusions than with malignant etiologies.[9]

Signs of pericardial tamponade include:

- Tachycardia.
- Pulsus paradoxus.
- Elevated jugular venous pressure.
- Hypotension.

However, some patients may develop tamponade without this clinical pattern.[4]

### Diagnosis

A chest x-ray may show widening of the cardiac silhouette [7] if the amount of pericardial fluid collection exceeds 250 mL.[20] However, a chest x-ray cannot determine the degree of cardiac dysfunction or tamponade. Loculated pericardial effusions may not be apparent on standard posterior/anterior or lateral chest radiographic views.[15]

Transthoracic echocardiography using apical, subxiphoid, and parasternal views can evaluate the presence, quantity, and quality of suspected pericardial effusions, as well as associated pericardial masses and inflammation. Moderate effusions on echocardiography show an echo-free space of 10 mm to 20 mm during diastole in M-mode or 2-dimensional echocardiography, whereas severe effusions have an echo-free space exceeding 20 mm.[21,22] Echocardiography can also determine right and left ventricular function and the possibility of right ventricular or atrial diastolic collapse.[7] Left ventricular collapse caused by large pleural effusions without clinically significant pericardial effusions has been reported.[4,16,23,24] However, transesophageal echocardiography may be useful for loculated effusions resulting from adhesions adjacent to the atria, where the thinness of the atrial wall may not be well visualized on transthoracic echocardiography.[4,16]

Echocardiography in pericardial effusion with tamponade shows right atrial or right ventricular compression, or left atrial compression, decreased left ventricular dimension, and absence of collapse of the inferior vena cava on deep inspiration.[6,25] Echocardiography findings predictive of pericardial tamponade have been reported.[26] Right atrial collapse has a sensitivity of 55% to 60% and a specificity of 50% to 68%. Right ventricular diastolic collapse has a lower sensitivity of 38% to 48% but a higher specificity ranging from 84% to 100%. Because neither finding provides 100% sensitivity and specificity, patients who are clinically symptomatic should have a diagnostic pericardiocentesis, even in the absence of definitive findings on echocardiography.[4,27] One study found right atrial collapse present in only 42% of patients and right ventricular collapse in 62%.[27] Nonetheless, 80% of patients with malignant pericardial effusions had symptomatic relief following pericardiocentesis.

The most definitive test for the diagnosis of cardiac tamponade is equalization of diastolic pressures between all cardiac chambers on right-heart cardiac catheterization.[7] However, this invasive technique is not necessary to diagnose tamponade.

An electrocardiogram (ECG) in patients with pericardial effusions typically shows diminished QRS amplitude in all leads. A classic but uncommonly seen finding in large effusions with pericardial tamponade is variation in the amplitude of the P wave and QRS complex in successive beats on ECG, referred to as electrical alternans. This finding results from movement of the heart within the pericardial sac.[6] Electrocardiography is not sufficiently sensitive to diagnose pericardial effusions.

Pericardial fluid cytology has an accuracy of 80% to 90% in diagnosing malignant pericardial effusion.[6,28] Lymphomas and mesothelioma have higher false-negative detection rates on cytology evaluation.[6,29] Pericardial fluid cytology has a specificity of up to 100%, but sensitivity ranges from 57% to 100% [10][Level of evidence: II] in patients with a known cancer diagnosis and pericardial fluid. Because nonmalignant causes of pericardial effusion can occur in 42% to 62% of patients with cancer and pericardial fluid, a negative cytology examination of pericardial fluid does not help distinguish malignant from nonmalignant causes. The use of more than one cytological preparation (such as concentrating the sample via cytospin, using special markers, or analyzing DNA content) increases the yield over a single preparation. However, multiple samples using the same technique did not significantly increase the diagnostic yield in a retrospective study of 215 patients.[30] In a survey of 80 samples, measurement of DNA index via flow cytometry of pericardial fluid has a sensitivity of 94.8% and a specificity of 100%, compared with routine cytology, which has a sensitivity of 98.5% and a specificity of 92.3%.[31][Level of evidence: II]

Pericardial biopsy may increase the sensitivity of diagnosing pericardial effusions of malignant origin. However, because pericardial effusions usually occur in advanced disease and portend a shorter survival than other sites of metastatic involvement, the relief of symptoms rather than diagnosis should be the overriding factor in determining the extent of the evaluation and the course of treatment. Two studies failed to show a difference in survival in cancer patients with pericardial effusion dependent on the results of fluid cytology.[10,32]

In a study of patients with stage I esophageal cancer who underwent radiation and chemotherapy, risk factors for developing pericardial effusion included advanced age, higher pericardial volume 30 (≥41.6 percentage of cardiac volume receiving more than 30 Gy), high body mass index, and diabetes mellitus.[33]

### Treatment

No large controlled, randomized, prospective clinical trials demonstrate the optimal management of malignant pericardial effusions or tamponade. Treatment should therefore be individualized to maximize symptom relief with minimal impact on quality of life. Treatment options include the following:[34][Level of evidence: III]

- Percutaneous pericardiocentesis.
- Percutaneous balloon pericardiotomy.
- Pericardial sclerosis.
- Subxiphoid pericardial window.
- Pericardiectomy.
- Pericardiotomy by thoracotomy or video-assisted thoracoscopy.

In choosing a treatment, consider the following:[34][Level of evidence: III]

- Relief of tamponade.
- Minimal invasiveness.
- Cost.
- Morbidity.
- Safety.
- Shortened hospitalization for patients with advanced disease.
- The patient's prognosis.

Large, symptomatic, malignant pericardial effusions are managed by draining the fluid, unless the goals of therapy dictate a less invasive, conservative approach, with concomitant shorter survival balanced against quality-of-life concerns. If treatment is indicated for tamponade, percutaneous subxiphoid pericardiocentesis is the treatment of choice in the acute setting. Echocardiography is recommended for catheter guidance.[6,35] Catheter drainage is recommended for large effusions to prevent rapid reaccumulation of fluid and subsequent tamponade and for the anticipated survival of the patient.

Recurrent pericardial effusion occurs in 21% [36] to 50% [34,35] of patients following pericardiocentesis. Limited case series suggest rates of pericardial fluid reaccumulation at 30 days ranging from 5% to 33% after pericardial drainage followed by intrapericardial treatment with sclerosing agents or phosphorus-colloid, compared with more than 50% for patients treated with pericardial drainage alone.[34,35]

Prolonged catheter drainage can be effective in preventing fluid reaccumulation; however, the mechanism is unclear. One series reported recurrence in 30% of patients at a median time of 39 days. In another series, the reported recurrence rate of the pericardial effusion was 13% by 1 year of follow-up.[37,38]

The prolonged catheter drainage could be left in for several days.[38,39] The catheter should be left in situ until the drainage is minimal (<25–50 mL in a 24-hour period) to none. In one series of 171 patients with malignant pericardial effusion who received echocardiography-guided pericardiocentesis followed by extended catheter drainage, the average time to very little catheter output (<50 mL in 24 hours) was about 3 days.[39] Other treatment options to prevent reaccumulation include intrapericardial sclerosis to obliterate the space within the pericardial sac or pericardiotomy to increase the quantity of fluid drained from the pericardium.

The most effective sclerosing agent for malignant pericardial effusions had been tetracycline, with success rates of up to 80%.[6] However, this agent is no longer available as an intravenous drug in the United States. Alternative sclerosants that have been used include the following:

- Doxycycline.[40]
- Bleomycin, thiotepa.[35];[41][Level of evidence: II]
- Carboplatin.[42][Level of evidence: II]
- Mitoxantrone.[43]
- Docetaxel.
- Chromic phosphate P 32.

Most patients may require three or more treatments to achieve adequate sclerosis.[6] Significant pain is reported by 16% of patients undergoing pericardial sclerosis.[6] The side effects of various sclerosing agents (e.g., chest pain and arrhythmias) must be considered. Of patients undergoing pericardial sclerotherapy, 70% to 80% have no fluid reaccumulation within 30 days of the procedure.[35]

A retrospective comparison of pericardiocentesis with sclerotherapy to open surgical drainage in 60 patients showed similar rates of treatment complications, incidence of recurrent effusion, and survival following treatment in both groups.[44] A retrospective review of 59 patients found similar success rates, whether patients were managed with surgical subxiphoid pericardial window or by pericardiocentesis with or without sclerosis.[34] Patients who underwent pericardiocentesis followed by pericardial window had the longest survival, with a median of 6 months. However, selection bias toward patients with better performance status undergoing more aggressive surgical techniques may contribute this reported survival advantage. The surgical procedure group had significantly higher average costs of $4,830 compared with $1,625 for patients managed with pericardiocentesis.[34]

Other studies have reported mortality, recurrence, and survival rates for sclerosis that are similar to or slightly lower than those for subxiphoid window or video-assisted thoracoscopy.[44,45];[46][Level of evidence: II][34][Level of evidence: III] Pericardiocentesis with or without sclerotherapy should be considered instead of more invasive procedures in patients with advanced disease or poor functional status.[47]

Transcutaneous balloon pericardiostomy is another technique that is less invasive than open surgical approaches, which include subxiphoid pericardial windows, thoracotomy with pericardiopleural window formation,[48] and thoracotomy with pericardectomy.

Video pericardioscopy has a diagnostic sensitivity of 97% for detecting malignant effusions.[49] Pericardioscopy also is useful for drainage of loculated effusions.[50][Level of evidence: II] Video-assisted thoracoscopy is preferable to more invasive surgical management and should be considered for patients requiring repeated pericardiocentesis to control symptomatic effusions.[47]

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Lam KY, Dickens P, Chan AC: Tumors of the heart. A 20-year experience with a review of 12,485 consecutive autopsies. Arch Pathol Lab Med 117 (10): 1027-31, 1993.8215825
Silvestri F, Bussani R, Pavletic N, et al.: Metastases of the heart and pericardium. G Ital Cardiol 27 (12): 1252-5, 1997.9470058
Galli M, Politi A, Jemoli R, et al.: Transcatheter management of cardiac and pericardial metastatic involvement. G Ital Cardiol 28 (6): 687-90, 1998.9672782
Shepherd FA: Malignant pericardial effusion. Curr Opin Oncol 9 (2): 170-4, 1997.9161796
Bisel HF, Wroblewski F, Ladue JS: Incidence and clinical manifestations of cardiac metastases. J Am Med Assoc 153 (8): 712-5, 1953.13096280
Fiocco M, Krasna MJ: The management of malignant pleural and pericardial effusions. Hematol Oncol Clin North Am 11 (2): 253-65, 1997.9137969 97283893
DeCamp MM, Mentzer SJ, Swanson SJ, et al.: Malignant effusive disease of the pleura and pericardium. Chest 112 (4 Suppl): 291S-295S, 1997.9337306
García-Riego A, Cuiñas C, Vilanova JJ: Malignant pericardial effusion. Acta Cytol 45 (4): 561-6, 2001 Jul-Aug.11480719
Warren WH: Malignancies involving the pericardium. Semin Thorac Cardiovasc Surg 12 (2): 119-29, 2000.10807434
Wang PC, Yang KY, Chao JY, et al.: Prognostic role of pericardial fluid cytology in cardiac tamponade associated with non-small cell lung cancer. Chest 118 (3): 744-9, 2000.10988197
Chiles C, Woodard PK, Gutierrez FR, et al.: Metastatic involvement of the heart and pericardium: CT and MR imaging. Radiographics 21 (2): 439-49, 2001 Mar-Apr.11259706
Posner MR, Cohen GI, Skarin AT: Pericardial disease in patients with cancer. The differentiation of malignant from idiopathic and radiation-induced pericarditis. Am J Med 71 (3): 407-13, 1981.7282729
Ang P, Tan EH, Leong SS, et al.: Primary intrathoracic malignant effusion: a descriptive study. Chest 120 (1): 50-4, 2001.11451815
Guberman BA, Fowler NO, Engel PJ, et al.: Cardiac tamponade in medical patients. Circulation 64 (3): 633-40, 1981.6455217
Beauchamp KA: Pericardial tamponade: an oncologic emergency. Clin J Oncol Nurs 2 (3): 85-95, 1998.10232148
D'Cruz IA, Kanuru N: Echocardiography of serous effusions adjacent to the heart. Echocardiography 18 (5): 445-56, 2001.11466157
White CS: MR evaluation of the pericardium and cardiac malignancies. Magn Reson Imaging Clin N Am 4 (2): 237-51, 1996.8724564
Celermajer DS, Boyer MJ, Bailey BP, et al.: Pericardiocentesis for symptomatic malignant pericardial effusion: a study of 36 patients. Med J Aust 154 (1): 19-22, 1991.1701847
Hancock EW: Neoplastic pericardial disease. Cardiol Clin 8 (4): 673-82, 1990.2249221
Mercé J, Sagristà-Sauleda J, Permanyer-Miralda G, et al.: Correlation between clinical and Doppler echocardiographic findings in patients with moderate and large pericardial effusion: implications for the diagnosis of cardiac tamponade. Am Heart J 138 (4 Pt 1): 759-64, 1999.10502224
Weitzman LB, Tinker WP, Kronzon I, et al.: The incidence and natural history of pericardial effusion after cardiac surgery--an echocardiographic study. Circulation 69 (3): 506-11, 1984.6692512
Sagristà-Sauleda J, Mercé J, Permanyer-Miralda G, et al.: Clinical clues to the causes of large pericardial effusions. Am J Med 109 (2): 95-101, 2000.10967149
Kisanuki A, Shono H, Kiyonaga K, et al.: Two-dimensional echocardiographic demonstration of left ventricular diastolic collapse due to compression by pleural effusion. Am Heart J 122 (4 Pt 1): 1173-5, 1991.1927874
Kaplan LM, Epstein SK, Schwartz SL, et al.: Clinical, echocardiographic, and hemodynamic evidence of cardiac tamponade caused by large pleural effusions. Am J Respir Crit Care Med 151 (3 Pt 1): 904-8, 1995.7881690
Himelman RB, Kircher B, Rockey DC, et al.: Inferior vena cava plethora with blunted respiratory response: a sensitive echocardiographic sign of cardiac tamponade. J Am Coll Cardiol 12 (6): 1470-7, 1988.3192844
Chong HH, Plotnick GD: Pericardial effusion and tamponade: evaluation, imaging modalities, and management. Compr Ther 21 (7): 378-85, 1995.7554815
Cooper JP, Oliver RM, Currie P, et al.: How do the clinical findings in patients with pericardial effusions influence the success of aspiration? Br Heart J 73 (4): 351-4, 1995.7756068
Meyers DG, Meyers RE, Prendergast TW: The usefulness of diagnostic tests on pericardial fluid. Chest 111 (5): 1213-21, 1997.9149572
Thurber DL, Edwards JE, Achor RW: Secondary malignant tumors of the pericardium. Circulation 26: 228-41, 1962.14037856
Garcia LW, Ducatman BS, Wang HH: The value of multiple fluid specimens in the cytological diagnosis of malignancy. Mod Pathol 7 (6): 665-8, 1994.7991525
Decker D, Stratmann H, Springer W, et al.: Benign and malignant cells in effusions: diagnostic value of image DNA cytometry in comparison to cytological analysis. Pathol Res Pract 194 (11): 791-5, 1998.9842638
Okamoto H, Shinkai T, Yamakido M, et al.: Cardiac tamponade caused by primary lung cancer and the management of pericardial effusion. Cancer 71 (1): 93-8, 1993.8416732
Tamari K, Isohashi F, Akino Y, et al.: Risk factors for pericardial effusion in patients with stage I esophageal cancer treated with chemoradiotherapy. Anticancer Res 34 (12): 7389-93, 2014.25503178
Anderson TM, Ray CW, Nwogu CE, et al.: Pericardial catheter sclerosis versus surgical procedures for pericardial effusions in cancer patients. J Cardiovasc Surg (Torino) 42 (3): 415-9, 2001.11398043
Martinoni A, Cipolla CM, Civelli M, et al.: Intrapericardial treatment of neoplastic pericardial effusions. Herz 25 (8): 787-93, 2000.11200128
Tsang TS, Seward JB, Barnes ME, et al.: Outcomes of primary and secondary treatment of pericardial effusion in patients with malignancy. Mayo Clin Proc 75 (3): 248-53, 2000.10725950
Allen KB, Faber LP, Warren WH, et al.: Pericardial effusion: subxiphoid pericardiostomy versus percutaneous catheter drainage. Ann Thorac Surg 67 (2): 437-40, 1999.10197666
Patel N, Rafique AM, Eshaghian S, et al.: Retrospective comparison of outcomes, diagnostic value, and complications of percutaneous prolonged drainage versus surgical pericardiotomy of pericardial effusion associated with malignancy. Am J Cardiol 112 (8): 1235-9, 2013.23827405
Lekhakul A, Assawakawintip C, Fenstad ER, et al.: Safety and Outcome of Percutaneous Drainage of Pericardial Effusions in Patients with Cancer. Am J Cardiol 122 (6): 1091-1094, 2018.30064854
Vaitkus PT, Herrmann HC, LeWinter MM: Treatment of malignant pericardial effusion. JAMA 272 (1): 59-64, 1994.8007081 94275962
Colleoni M, Martinelli G, Beretta F, et al.: Intracavitary chemotherapy with thiotepa in malignant pericardial effusions: an active and well-tolerated regimen. J Clin Oncol 16 (7): 2371-6, 1998.9667253
Moriya T, Takiguchi Y, Tabeta H, et al.: Controlling malignant pericardial effusion by intrapericardial carboplatin administration in patients with primary non-small-cell lung cancer. Br J Cancer 83 (7): 858-62, 2000.10970685
Norum J, Lunde P, Aasebø U, et al.: Mitoxantrone in malignant pericardial effusion. J Chemother 10 (5): 399-404, 1998.9822359
Girardi LN, Ginsberg RJ, Burt ME: Pericardiocentesis and intrapericardial sclerosis: effective therapy for malignant pericardial effusions. Ann Thorac Surg 64 (5): 1422-7; discussion 1427-8, 1997.9386714
Maher EA, Shepherd FA, Todd TJ: Pericardial sclerosis as the primary management of malignant pericardial effusion and cardiac tamponade. J Thorac Cardiovasc Surg 112 (3): 637-43, 1996.8800150 96393363
Liu G, Crump M, Goss PE, et al.: Prospective comparison of the sclerosing agents doxycycline and bleomycin for the primary management of malignant pericardial effusion and cardiac tamponade. J Clin Oncol 14 (12): 3141-7, 1996.8955660 97113820
Lin JC, Hazelrigg SR, Landreneau RJ: Video-assisted thoracic surgery for diseases within the mediastinum. Surg Clin North Am 80 (5): 1511-33, 2000.11059717
Olson JE, Ryan MB, Blumenstock DA: Eleven years' experience with pericardial-peritoneal window in the management of malignant and benign pericardial effusions. Ann Surg Oncol 2 (2): 165-9, 1995.7728571
Porte HL, Janecki-Delebecq TJ, Finzi L, et al.: Pericardoscopy for primary management of pericardial effusion in cancer patients. Eur J Cardiothorac Surg 16 (3): 287-91, 1999.10554845
Millaire A, Wurtz A, de Groote P, et al.: Malignant pericardial effusions: usefulness of pericardioscopy. Am Heart J 124 (4): 1030-4, 1992.1529876

## Superior Vena Cava Syndrome

### Overview

Superior vena cava syndrome (SVCS) is an array of symptoms caused by the impairment of blood flow through the superior vena cava (SVC) to the right atrium. Symptoms that suggest this syndrome include the following:[1]

- Dyspnea.
- Coughing.
- Swelling of the face, neck, upper trunk, and extremities.

In rare instances, patients may complain of hoarseness, chest pain, dysphagia, and hemoptysis.

Physical signs that may be noted on presentation include the following:

- Neck vein distention.
- Thoracic vein distention.
- Edema of the face or upper extremities.
- Plethora.
- Tachypnea.

Rarely, cyanosis, Horner syndrome, and a paralyzed vocal cord may also be present.[1]

SVCS is usually a sign of locally advanced bronchogenic carcinoma. Survival depends on the status of the patient’s disease. When small cell bronchogenic carcinoma is treated with chemotherapy, the median survival times with or without SVCS are almost identical (42 weeks or 40 weeks, respectively). The 24-month survival rate is 9% in patients without SVCS and 3% in those with the syndrome. When the malignancy is treated with radiation therapy, 46% of patients who have non-small cell lung cancer experience relief of symptoms, compared with 62% of patients who have small cell bronchogenic carcinoma. The 2-year survival rate of 5% is almost the same for both groups.[2]

Most patients with non-Hodgkin lymphoma and SVCS respond to appropriate chemotherapy or to combined-modality regimens.

### Etiology and Physiology

Since William Hunter first described SVCS in 1757, the spectrum of underlying conditions associated with it has shifted from tuberculosis and syphilitic aneurysms of the ascending aorta to malignant disorders. Almost 95% of SVCS cases described in published modern series result from cancer. The most common cause is small cell bronchogenic carcinoma, followed by squamous cell carcinoma of the lung, adenocarcinoma of the lung, non-Hodgkin lymphoma, and large cell carcinoma of the lung.[3] Nonmalignant causes of SVCS in cancer patients include thrombosis that is associated with intracaval catheters or pacemaker wires.[4] A rare cause of SVCS is fibrosing mediastinitis, either idiopathic or associated with histoplasmosis.[5] Additional rare causes of SVCS include metastatic germ cell neoplasms, metastatic breast cancer, colon cancer, Kaposi sarcoma, esophageal carcinoma, fibrous mesothelioma, Behçet syndrome, thymoma, substernal thyroid goiter, Hodgkin lymphoma, and sarcoidosis.[6]

Knowledge of the anatomy of the SVC and its relationship to the surrounding lymph nodes is essential to understand development of the syndrome. The SVC is formed by the junction of the left and right brachiocephalic veins in the mid third of the mediastinum. The SVC extends caudally for 6 to 8 cm, coursing anterior to the right mainstem bronchus and terminating in the superior right atrium, and extends anteriorly to the right mainstem bronchus. The SVC is joined posteriorly by the azygos vein as it loops over the right mainstem bronchus and lies posterior to and to the right of the ascending aorta. The mediastinal parietal pleura is lateral to the SVC, creating a confined space, and the SVC is adjacent to the right paratracheal, azygous, right hilar, and subcarinal lymph node groups. The vessel itself is thin-walled, and the blood flowing in it is under low pressure. Thus, when the nodes or ascending aorta enlarge, the SVC is compressed, blood flow slows, and complete occlusion may occur.

The severity of SVCS depends on the speed of onset and location of the obstruction. The more rapid the onset, the more severe the symptoms because the collateral veins do not have time to distend to accommodate an increased blood flow.[7]

- If the obstruction is above the entry of the azygos vein, the syndrome is less pronounced because the azygous venous system can readily distend to accommodate the shunted blood with less venous pressure developing in the head, arms, and upper thorax.
- If the obstruction is below the entry of the azygos vein, more florid symptoms and signs are seen because the blood must be returned to the heart via the upper abdominal veins and the inferior vena cava, which requires higher venous pressure.

One study suggested that the general recruitment of venous collaterals over time may lead to remission of the syndrome, although the SVC remains obstructed.[8]

### Assessment and Diagnosis

Once SVCS is recognized, prompt clinical attention is important. A diagnosis should be established before therapy begins because:[3]

- 75% of patients have symptoms and signs for longer than 1 week before seeking medical attention.
- Cancer patients diagnosed with SVCS do not die of the syndrome itself but rather their underlying disease.
- 3% to 5% of the patients diagnosed with SVCS do not have cancer.

In the absence of tracheal obstruction, SVCS is unlikely to be a life-threatening oncologic emergency, and treatment before definitive diagnosis is not justified.

The initial evaluation of the patient should include a chest x-ray to look for mediastinal masses and associated findings, such as pleural effusion, lobar collapse, or cardiomegaly. Computed tomography (CT) scanning of the thorax yields the most useful diagnostic information and can define the anatomy of the involved mediastinal nodes. Venous patency and the presence of thrombi are assessed using contrast and rapid scanning techniques.[9] Depending on local expertise, contrast or nuclear venography, magnetic resonance imaging, and ultrasonography may be valuable in assessing the site and nature of the obstruction.

If bronchogenic carcinoma is suspected, a sputum specimen should be obtained. If the specimen is negative, a biopsy specimen should be taken from the most accessible site that is clinically involved with disease. The biopsy approach depends on the working diagnosis, location of the tumor, physiological status of the patient, and expertise at the facility. It may include:[10]

- Bronchoscopy.
- Biopsy of palpable cervical or supraclavicular lymph nodes.
- Needle biopsy of a lung mass or mediastinal nodes using either CT or ultrasonography guidance.
- Mediastinoscopy.
- Mediastinotomy.
- Median sternotomy.
- Video-assisted thoracoscopy.
- Conventional thoracotomy.

The biopsy findings will help the clinician plan appropriate treatment.

### Treatment Options for SVCS

The treatment of SVCS depends on the following:

- The etiology of the obstruction.
- The severity of symptoms.
- The patient's prognosis.
- Patient preferences and goals for therapy.

Radiation therapy or chemotherapy should be withheld until the etiology of the obstruction is clear. The treatments discussed here focus on SVC obstruction caused by a malignant tumor. Because the treatment of malignant obstruction may depend on tumor histology, a histological diagnosis should be made before starting treatment. Unless there is airway obstruction or cerebral edema, treatment may be delayed until after an assessment, with no negative effect on outcome.[1,11-15]

#### Medical management

A patient with sufficient collateral blood flow and minimal symptoms may not need treatment. If the lesion is above the azygous vein or if the onset of SVC occlusion is slow enough to allow sufficient collateral circulation, the symptoms and signs may stabilize, and further therapy may not be needed. Short-term palliation of a symptomatic patient who does not want aggressive treatment may be achieved by elevating the head and using corticosteroids and diuresis. Although no definitive studies prove the effectiveness of steroids, they may be useful to treat respiratory compromise. Diuretics may relieve edema but can cause systemic complications, such as dehydration.[9,16]

#### Radiation therapy

If the obstruction of the SVC is caused by a tumor that is not sensitive to chemotherapy, radiation therapy should be given. Treatment with larger fractions of radiation is thought to help. However, one study shows no obvious need for large radiation fraction sizes for the first few radiation treatments as was previously believed.[17] Many fractionation schemes have been used, with doses ranging from 30 Gy in 10 fractions to 50 Gy in 25 fractions. Relief of symptoms is reported to be 62% to 80% in patients with small cell lung cancer and about 46% in patients with non-small cell lung cancer.[2,18] In one study, more than 90% of the patients achieved a partial or complete response with a 3-week regimen of 8 Gy given once a week for a total dose of 24 Gy.[19]

#### Chemotherapy

Chemotherapy is the treatment of choice for sensitive tumors such as lymphoma or small cell lung cancer. SVCS does not appear to be an independent prognostic factor, and its presence should not change the treatment approach. Rapid initiation of chemotherapy can result in complete and partial response rates of the SVCS of more than 80% in patients with small cell lung cancer.[2,18]

#### Thrombolysis

It has been suggested that SVCS arises when a thrombus forms in a partially occluded vein. In patients with a documented thrombus in the SVC, treatment may include thrombectomy, with or without tissue plasminogen activator or other thrombolytic agents, such as streptokinase or urokinase.[1]

#### Stent placement

Numerous small studies have reported the use of an intravascular expandable stent to reopen the occluded SVC; however, no prospectively designed comparative studies have been published.[20] The reported response rates have been about 90% or greater.[21][Level of evidence: II] There is no agreement on the need for anticoagulant therapy after stent placement. In one series that used anticoagulant therapy as part of the treatment protocol, there were reports of reocclusion after this therapy was stopped.[22][Level of evidence: II] However, in another study, 17 patients with cancer who were treated with stents and did not receive anticoagulant therapy had no occlusions.[23][Level of evidence: II]

#### Surgery

Surgical bypass of an obstructed SVC is more appropriate for patients with a benign obstruction than with a malignant obstruction,[24] although surgical bypass has also been used for patients with malignant obstructions.

### Psychosocial Considerations

Patients and family members are often frightened and anxious about the symptoms of SVCS, particularly swelling, dysphagia, coughing, and hoarseness. Patients and family members need information about the cause of the symptoms and short-term measures for palliation, especially during the diagnostic period. When aggressive treatment is declined because of the terminal nature of the underlying disease, symptom management can be offered to patients and family members.

Because most adult patients who develop SVCS have lung cancer, the treatment and psychological support approaches for SVCS should take into account the patient’s prognosis and mental condition, goals of care, and other symptoms caused by the malignancy.[25]

### Pediatric Considerations

As described in this summary, SVCS refers to the symptoms associated with the compression or obstruction of the SVC; the compression of the trachea is termed superior mediastinal syndrome (SMS). Because SMS and the resulting respiratory compromise frequently occur in children with SVCS, the two syndromes have become almost synonymous in pediatric practice.[26,27] In adults, the trachea and the right mainstem bronchus are relatively rigid structures compared with the vena cava, but in children, these structures are more susceptible to compression. In addition, the relatively smaller intraluminal diameters of a child’s trachea and bronchus can tolerate little edema before respiratory symptoms occur. Because of this accompanying respiratory component, SVCS in children differs from the adult syndrome and is a serious medical emergency.

The most common symptoms of SVCS in children are similar to those in adults and include the following:[26]

- Coughing.
- Hoarseness.
- Dyspnea.
- Orthopnea.
- Chest pain.

Less common but more serious symptoms include the following:

- Syncope.
- Anxiety.
- Confusion.
- Lethargy.
- Headache.
- Distorted vision.
- A sense of fullness in the ears.

SVCS is rare in children, appearing at presentation in 12% of pediatric patients with malignant mediastinal tumors.[28,29] The etiology, diagnosis, and treatment of SVCS in children differ from those in adults. The most frequent cause of SVCS in adults is bronchogenic carcinoma;[3] in children, it is non-Hodgkin lymphoma. As in adults, a frequent nonmalignant cause is thrombosis from catheterization for venous access.[26]

A physical examination, chest radiograph, and medical history are usually sufficient to diagnose SVCS. If lymphomas or other malignant diseases are suspected, a tissue sample may aid diagnosis. However, the procedure to obtain the specimen may involve significant risk and may not be clinically feasible. Children with SVCS have a poor tolerance for the necessary general anesthesia because the accompanying cardiovascular and pulmonary changes aggravate the SVCS, often making intubation impossible. Also, extubation may be difficult or impossible, requiring prolonged airway provision (intubation). A CT scan of the chest to determine tracheal size, upright and supine echocardiography, and a flow volume loop may help evaluate anesthetic risk. Because anesthesia use is a serious risk, the diagnosis should be made with the least invasive means possible.[30] Published reports suggest a stepwise approach.[26]

When a malignant mass causes SVCS, the situation may be a medical emergency with no opportunity to establish a tissue diagnosis. In these cases, the most appropriate course may be to initiate empiric therapy before biopsy. The traditional empiric therapy is radiation therapy, with the daily dose governed by the presumed radiosensitivity of the tumor. After radiation therapy, respiratory deterioration from the apparent tracheal swelling may occur. This swelling occurs because narrow lumens in children cannot accommodate edema and because of the greater degree of edema at onset, the result of rapid tumor growth in children. In these situations, a course of prednisone at 10 mg/m^2^ of body surface area 4 times per day may be necessary.[26]

In addition to radiation, empiric therapy for SVCS has included chemotherapeutic agents incorporating steroids, cyclophosphamide, or both in combination with an anthracycline and vincristine.[26] If the tumor fails to respond, it may be a benign lesion.

If surgery becomes necessary, it should be performed with the patient in the semi-Fowler’s position, allowing the surgeon the ability to rapidly change the patient's position to lateral or prone. Cardiopulmonary bypass facilities and a rigid bronchoscope should be available in a standby capacity.[30]

### References

Gauden SJ: Superior vena cava syndrome induced by bronchogenic carcinoma: is this an oncological emergency? Australas Radiol 37 (4): 363-6, 1993.8257336 94079583
Urban T, Lebeau B, Chastang C, et al.: Superior vena cava syndrome in small-cell lung cancer. Arch Intern Med 153 (3): 384-7, 1993.8381263 93151695
Yellin A, Rosen A, Reichert N, et al.: Superior vena cava syndrome. The myth--the facts. Am Rev Respir Dis 141 (5 Pt 1): 1114-8, 1990.2339833 90253058
Gray BH, Olin JW, Graor RA, et al.: Safety and efficacy of thrombolytic therapy for superior vena cava syndrome. Chest 99 (1): 54-9, 1991.1984986 91085267
Goodwin RA, Nickell JA, Des Prez RM: Mediastinal fibrosis complicating healed primary histoplasmosis and tuberculosis. Medicine (Baltimore) 51 (3): 227-46, 1972.4623262 72168341
Yahalom J: Oncologic emergencies: superior vena cava syndrome. In: DeVita VT, Hellman S, Rosenberg SA, eds.: Cancer: Principles and Practice of Oncology. JB Lippincott Company, 4th Edition, 1993, pp 2111-2118.
Netter FH: Superior vena cava syndrome. In: Netter FH: The CIBA Collection of Medical Illustrations: Respiratory System. CIBA Pharmaceutical Company, 1980, pp 164.
Ahmann FR: A reassessment of the clinical implications of the superior vena caval syndrome. J Clin Oncol 2 (8): 961-9, 1984.6205125 84266965
Abner A: Approach to the patient who presents with superior vena cava obstruction. Chest 103 (4 Suppl): 394S-397S, 1993.8462332 93215326
Hsu JW, Chiang CD, Hsu WH, et al.: Superior vena cava syndrome in lung cancer: an analysis of 54 cases. Gaoxiong Yi Xue Ke Xue Za Zhi 11 (10): 568-73, 1995.7494237 96072226
Chen JC, Bongard F, Klein SR: A contemporary perspective on superior vena cava syndrome. Am J Surg 160 (2): 207-11, 1990.2382775 90342960
Stanford W, Doty DB: The role of venography and surgery in the management of patients with superior vena cava obstruction. Ann Thorac Surg 41 (2): 158-63, 1986.3947168 86129645
Salsali M, Cliffton EE: Superior vena caval obstruction with lung cancer. Ann Thorac Surg 6 (5): 437-42, 1968.4316800 70231098
Schraufnagel DE, Hill R, Leech JA, et al.: Superior vena caval obstruction. Is it a medical emergency? Am J Med 70 (6): 1169-74, 1981.7234887 81204452
Shimm DS, Logue GL, Rigsby LC: Evaluating the superior vena cava syndrome. JAMA 245 (9): 951-3, 1981.7463700 81120157
Baker GL, Barnes HJ: Superior vena cava syndrome: etiology, diagnosis, and treatment. Am J Crit Care 1 (1): 54-64, 1992.1307879 93357886
Chan RH, Dar AR, Yu E, et al.: Superior vena cava obstruction in small-cell lung cancer. Int J Radiat Oncol Biol Phys 38 (3): 513-20, 1997.9231674 97375357
Würschmidt F, Bünemann H, Heilmann HP: Small cell lung cancer with and without superior vena cava syndrome: a multivariate analysis of prognostic factors in 408 cases. Int J Radiat Oncol Biol Phys 33 (1): 77-82, 1995.7642434 95370067
Rodrigues CI, Njo KH, Karim AB: Hypofractionated radiation therapy in the treatment of superior vena cava syndrome. Lung Cancer 10 (3-4): 221-8, 1993.7521265 94356425
Tanigawa N, Sawada S, Mishima K, et al.: Clinical outcome of stenting in superior vena cava syndrome associated with malignant tumors. Comparison with conventional treatment. Acta Radiol 39 (6): 669-74, 1998.9817039 99033827
Nicholson AA, Ettles DF, Arnold A, et al.: Treatment of malignant superior vena cava obstruction: metal stents or radiation therapy. J Vasc Interv Radiol 8 (5): 781-8, 1997 Sep-Oct.9314368 97458024
Dyet JF, Nicholson AA, Cook AM: The use of the Wallstent endovascular prosthesis in the treatment of malignant obstruction of the superior vena cava. Clin Radiol 48 (6): 381-5, 1993.8293642 94123530
Irving JD, Dondelinger RF, Reidy JF, et al.: Gianturco self-expanding stents: clinical experience in the vena cava and large veins. Cardiovasc Intervent Radiol 15 (5): 328-33, 1992 Sep-Oct.1423394 93046386
Doty DB: Bypass of superior vena cava: Six years' experience with spiral vein graft for obstruction of superior vena cava due to benign and malignant disease. J Thorac Cardiovasc Surg 83 (3): 326-38, 1982.7038314 82147081
Holland JC: Lung Cancer. In: Holland JC, Rowland JH, eds.: Handbook of Psychooncology: Psychological Care of the Patient With Cancer. Oxford University Press, 1989, pp 180-187.
Lange B, O'Neill JA, D'Angio G, et al.: Oncologic emergencies. In: Pizzo PA, Poplack DG: Principles and Practice of Pediatric Oncology. 2nd ed. JB Lippincott, 1993, pp 951-972.
Ingram L, Rivera GK, Shapiro DN: Superior vena cava syndrome associated with childhood malignancy: analysis of 24 cases. Med Pediatr Oncol 18 (6): 476-81, 1990.2233519 91042120
Pokorny WJ, Sherman JO: Mediastinal masses in infants and children. J Thorac Cardiovasc Surg 68 (6): 869-75, 1974.4479358 75019682
King RM, Telander RL, Smithson WA, et al.: Primary mediastinal tumors in children. J Pediatr Surg 17 (5): 512-20, 1982.7175638 83085212
Neuman GG, Weingarten AE, Abramowitz RM, et al.: The anesthetic management of the patient with an anterior mediastinal mass. Anesthesiology 60 (2): 144-7, 1984.6546480 84126094

## Latest Updates to This Summary (02/20/2025)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Editorial changes were made to this summary.

This summary is written and maintained by the PDQ Supportive and Palliative Care Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/supportive-care), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the pathophysiology and treatment of cardiopulmonary syndromes, including dyspnea, malignant pleural effusion, malignant pericardial effusion, and superior vena cava syndrome. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Supportive and Palliative Care Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/supportive-care), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Supportive and Palliative Care Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Supportive and Palliative Care Editorial Board. PDQ Cardiopulmonary Syndromes. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/treatment/side-effects/cardiopulmonary-hp-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389275]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).